# Liver (Hepatocellular) Cancer Screening

Patient Version

This PDQ cancer information summary has current information about liver (hepatocellular) cancer screening. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board.

## What Is Liver Cancer?

Primary liver cancer is a disease in which malignant (cancer) cells form in the tissues of the liver. Cancer that forms in other parts of the body and spreads to the liver is not primary liver cancer. The liver is one of the largest organs in the body. It has two lobes and fills the upper right side of the abdomen inside the rib cage. The main functions of the liver include the following:

- to make bile to help digest fat that comes from food
- to store glycogen (sugar), which the body uses for energy
- to filter harmful substances from the blood so they can be passed from the body in stools and urine

Anatomy of the liver. The liver is in the upper abdomen near the stomach, intestines, gallbladder, and pancreas. The liver has a right lobe and a left lobe. Each lobe is divided into two sections (not shown).

Anatomy of the liver; drawing shows the right and left lobes of the liver. Also shown are the bile ducts, gallbladder, stomach, spleen, pancreas, small intestine, and colon.

### Types of liver cancer

Hepatocellular carcinoma and bile duct cancer (cholangiocarcinoma) (https://www.cancer.gov/types/liver/bile-duct-cancer/treatment) are the main types of adult primary liver cancer.

Most adult primary liver cancers are hepatocellular carcinomas. This type of liver cancer is the third leading cause of cancer-related deaths worldwide.

Primary liver cancer can occur in both adults and children. However, treatment for children is different than treatment for adults. For more information, see Childhood Liver Cancer (https://www.cancer.gov/types/liver/childhood-liver-cancer).

### Signs and symptoms of liver cancer

These and other signs and symptoms may be caused by adult primary liver cancer or by other conditions. Check with your doctor if you have any of the following:

- a hard lump on the right side just below the rib cage
- discomfort in the upper abdomen on the right side
- a swollen abdomen
- pain near the right shoulder blade or in the back
- jaundice (yellowing of the skin and whites of the eyes)
- easy bruising or bleeding
- unusual tiredness or weakness
- nausea and vomiting
- loss of appetite or feelings of fullness after eating a small meal
- weight loss for no known reason
- pale, chalky bowel movements and dark urine
- fever

## Liver Cancer Screening

Screening is looking for cancer before a person has any symptoms. This can help find cancer at an early stage. When abnormal tissue or cancer is found early, it may be easier to treat.

It is important to remember that your doctor does not necessarily think you have cancer if he or she suggests a screening test. Screening tests are given when you have no cancer symptoms. If a screening test result is abnormal, you may need to have more tests done to find out if you have cancer. These are called diagnostic tests.

### Tests to screen for liver cancer

Although there is no standard or routine screening tests for liver cancer, the following tests are being used or studied to screen for it:

#### Ultrasound

Ultrasound is a procedure in which high-energy waves (ultrasound) are bounced off the liver and make echoes. The echoes form a picture of the liver called a sonogram.

#### CT scan

CT scan is a procedure that makes a series of detailed pictures of the liver, taken from different angles. The pictures are made by a computer linked to an x-ray machine. A dye may be injected into a vein or swallowed to help the liver show up more clearly. This procedure is also called CAT scan or computed tomography.

#### Alpha-fetoprotein tumor marker

Tumor markers, also called biomarkers, are substances made by the tumor that may be found in the blood, other body fluids, or tissues. A high level of a specific tumor marker may mean that a certain type of cancer is present in the body.

Alpha-fetoprotein (AFP) is the most widely used tumor marker for detecting liver cancer. However, other cancers and certain conditions, including pregnancy, hepatitis, and other types of cancer, may also increase AFP levels.

Specific tumor markers that may lead to early detection of liver cancer are being studied.

Doctors use these screening tests to find, or diagnose, liver cancer. Learn more about Liver Cancer Diagnosis (https://www.cancer.gov/types/liver/what-is-liver-cancer/diagnosis).

### Risks of liver cancer screening

Decisions about screening tests can be difficult. Not all screening tests are helpful and most have risk of harms associated with them. Before having any screening test, you may want to discuss the test with your doctor. It is important to be aware of any possible harms of the test and whether the test has been proven to reduce the risk of dying from cancer.

The risks of liver cancer screening include the following:

- False-negative test results can occur. Screening test results may appear to be normal even though liver cancer is present. A person who receives a false-negative test result (one that shows there is no cancer when there really is) may delay seeking medical care even if there are symptoms.
- False-positive test results can occur. Screening test results may appear to be abnormal even though no cancer is present. A false-positive test result (one that shows there is cancer when there really isn't) can cause anxiety and is usually followed by diagnostic tests and procedures, such as a liver biopsy, which also have risks.
- Procedures to diagnose liver cancer can cause complications. Abnormal screening results may be followed up with a liver biopsy to diagnose liver cancer. Liver biopsy may cause the following rare, but serious, complications:
  - hemorrhage
  - trouble breathing
  - leakage of bile, which can cause an infection of the lining of the abdomen
  - a small puncture (hole) in an organ in the abdomen
  - spread of cancer cells along the needle path where the biopsy needle is inserted and withdrawn (taken out)

Your doctor can advise you about your risk for liver cancer and your need for screening tests.